# Cancer Screening Overview (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Purpose of Summary

The purpose of this summary is to present an evidence-based approach used in the development of the screening summaries. Evaluating screening requires weighing risks and benefits. Monetary cost and cost-effectiveness are not considered when evaluating the evidence. Levels of evidence are assigned when evaluating screening tests.

## Potential Benefits and Harms

In general, the benefit of cancer screening derives from detecting cancer in earlier and more treatable stages, and thereby, reducing mortality from cancer. In addition, for some cancer types and screening modalities, such as endoscopic screening for colorectal cancer and Papanicolaou (Pap) smears for cervical cancer, screening can also prevent the occurrence of cancer by identifying and removing cancer precursors. Screening may also reduce cancer morbidity when the treatment for earlier-stage cancer is associated with fewer side effects than the treatment for advanced cancers.

Known harms from screening include the following:[1]

1. The possibility of serious test-related complications, which may be immediate (e.g., perforation with colonoscopy) or delayed (e.g., potential carcinogenesis from radiation exposure).
2. A false-positive screening test result, which may cause anxiety and lead to additional invasive diagnostic procedures.
3. Overdiagnosis, which occurs when screening procedures detect cancers that would never become clinically apparent in the absence of screening.
4. Overtreatment resulting from overdiagnosis.

Because screening tests themselves are generally noninvasive, immediate harms from the test are typically minor. Colonoscopy is an exception in that it is an invasive test. It also functions as a diagnostic follow-up examination for other colorectal cancer screening modalities, such as a fecal occult blood (FOB) test.

Commonly used screening tests, such as mammography for breast cancer and prostate-specific antigen (PSA) for prostate cancer, have false-positive rates per screen in the range of 5% to 10%; with repeat screening, cumulative false-positive rates for these tests are substantially higher.[2-4] Follow-up invasive diagnostic procedures, such as a prostate biopsy, are associated with low but non-negligible risks of complications. For screening tests such as colonoscopy or Pap smears where precursor lesions, in addition to invasive cancer, are targets of the screen, the definition of a false positive is modified from simply a positive screen in an individual without cancer. For example, for cervical cancer screening, a positive Pap smear with an eventual diagnosis of high-grade intraepithelial lesion (HSIL) would not be considered a false positive, since HSIL is a target lesion.

Overdiagnosis occurs when screening procedures detect cancers that would never become clinically apparent in the absence of screening. It is a special concern because identification of the cancer does not benefit the individual, while the side effects of diagnostic procedures and cancer treatment may cause significant harm. The overall harm of overdiagnosis is related to both the frequency of its occurrence, as well as to the downstream consequences of subsequent treatment. For example, in prostate cancer screening with PSA, there is a high rate of overdiagnosed disease and the harms of curative treatment, including impotence and urinary incontinence, are relatively common, serious, and long-lasting. Therefore, overdiagnosis is a major source of harms in PSA screening.[5] Some of the harms of overdiagnosis may be mitigated by strategies, such as active surveillance in prostate cancer, that attempt to defer immediate treatment in favor of following patients for any signs of worsening prognosis.

In general, overdiagnosis is more common in older individuals and those with otherwise limited life expectancy since the slowly growing lesions associated with overdiagnosed cancers have less time to become clinically apparent in such persons. Therefore, attempts have been made to discourage screening beyond certain age ranges; for example, most recommendations for mammography screening exclude women aged 75 or older and those with less than 10 years of life expectancy.[6]

In developing the cancer screening summaries, the PDQ Screening and Prevention Editorial Board uses the following definitions:

- Screening is a means of detecting disease early in asymptomatic people.
- Positive results of examinations, tests, or procedures may not be diagnostic but instead identify people who warrant further evaluation.
- Some positive screening tests require additional procedures, such as biopsies of the indicated organ. These may rule out cancer or confirm the diagnosis of cancer.

The PDQ does not issue clinical practice guidelines. Many public health organizations present guidelines for health care and screening activities. Their quality varies widely. Some rely on systematic reviews of evidence of variable quality. Some are influenced by the professional, financial, and intellectual interests of guideline authors and funders. These may conflict with the primary interest—the overall well-being of the patient.[7-9]

The highest quality guidelines as assessed by the Appraisal of Guidelines for Research and Evaluation (AGREE) are those based on the best systematic reviews as evaluated using the Assessment of Multiple Systematic Reviews (AMSTAR).

### References

Kramer BS: The science of early detection. Urol Oncol 22 (4): 344-7, 2004 Jul-Aug.15283894
Grubb RL, Pinsky PF, Greenlee RT, et al.: Prostate cancer screening in the Prostate, Lung, Colorectal and Ovarian cancer screening trial: update on findings from the initial four rounds of screening in a randomized trial. BJU Int 102 (11): 1524-30, 2008.19035857
Hubbard RA, Kerlikowske K, Flowers CI, et al.: Cumulative probability of false-positive recall or biopsy recommendation after 10 years of screening mammography: a cohort study. Ann Intern Med 155 (8): 481-92, 2011.22007042
Aberle DR, Adams AM, Berg CD, et al.: Reduced lung-cancer mortality with low-dose computed tomographic screening. N Engl J Med 365 (5): 395-409, 2011.21714641
Fenton JJ, Weyrich MS, Durbin S, et al.: Prostate-Specific Antigen-Based Screening for Prostate Cancer: Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 319 (18): 1914-1931, 2018.29801018
Siu AL; U.S. Preventive Services Task Force: Screening for Breast Cancer: U.S. Preventive Services Task Force Recommendation Statement. Ann Intern Med 164 (4): 279-96, 2016.26757170
Norris SL, Burda BU, Holmer HK, et al.: Author's specialty and conflicts of interest contribute to conflicting guidelines for screening mammography. J Clin Epidemiol 65 (7): 725-33, 2012.22498428
Ransohoff DF, Pignone M, Sox HC: How to decide whether a clinical practice guideline is trustworthy. JAMA 309 (2): 139-40, 2013.23299601
Lenzer J: Why we can't trust clinical guidelines. BMJ 346: f3830, 2013.23771225

## Scientific Basis for Summary Development

The cancer screening summaries are based on various levels of published scientific evidence and collective clinical experience. The highest level of evidence is taken as mortality reduction in controlled, randomized clinical trials. The results of clinical studies, case-control studies, cohort studies, and other information are also considered in formulating the summaries. In addition, the incidence of cancer, stage distribution, treatment, and mortality rates are considered. The summaries are subject to modification as new evidence becomes available.

There are at least two requirements for screening to be efficacious:

1. The test or procedure must be able to detect some cancers earlier than if the cancer were detected as a result of the development of symptoms.
2. Treatment initiated earlier as a consequence of screening must result in an improved outcome for at least some patients.

These requirements are necessary but not sufficient to prove the efficacy of screening, which requires a decrease in cause-specific mortality. A cautionary tale is a Japanese screening program for childhood neuroblastoma that detected malignancy in ten times as many infants as in unscreened populations. But, a randomized trial showed that it did not yield any improvement in cause-specific mortality.[1] Other neuroblastoma screening projects confirmed the result.[2-4]

### References

Yamamoto K, Hayashi Y, Hanada R, et al.: Mass screening and age-specific incidence of neuroblastoma in Saitama Prefecture, Japan. J Clin Oncol 13 (8): 2033-8, 1995.7636545 95363487
Bessho F: Effects of mass screening on age-specific incidence of neuroblastoma. Int J Cancer 67 (4): 520-2, 1996.8759611 96323314
Woods WG, Tuchman M, Robison LL, et al.: A population-based study of the usefulness of screening for neuroblastoma. Lancet 348 (9043): 1682-7, 1996 Dec 21-28.8973429 97128889
Soderstrom L, Woods WG, Bernstein M, et al.: Health and economic benefits of well-designed evaluations: some lessons from evaluating neuroblastoma screening. J Natl Cancer Inst 97 (15): 1118-24, 2005.16077069

## Detection

Direct or assisted visual observation is the most widely available examination for the detection of cancer. It is useful in identifying suspicious lesions in the skin, retina, lip, mouth, external genitalia, and cervix.

The second most available detection procedure is palpation to detect lumps, nodules, or tumors in the breast, mouth, salivary glands, thyroid, subcutaneous tissues, anus, rectum, prostate, testes, ovaries and uterus, and enlarged lymph nodes in the neck, axilla, or groin.

Internal cancers require procedures and tests such as endoscopy, x-rays, magnetic resonance imaging, or ultrasound. Laboratory tests, such as the Pap smear or the FOB test have been employed for the detection of specific cancers.

Screening test performance is usually measured in terms of the following:

- Sensitivity is the probability of a positive test given that the person has cancer.
- Specificity is the probability of a negative test given that the person does not have cancer.
- Positive predictive value (PPV) is the probability that the person has cancer given a positive test.
- Negative predictive value (NPV) is the probability that the person does not have cancer given a negative test.

PPV and NPV are related to sensitivity and specificity by Bayes rule, where prior probability is prevalence of disease in the population being screened. PPV and, to a lesser extent, NPV are affected by the prevalence of disease in the population being screened. For a given sensitivity and specificity, the lower the prevalence, the lower the PPV and the higher the NPV.

The concepts of sensitivity, specificity, PPV, and NPV are complicated for blood tests that aim to detect many types of cancers from a single blood sample. These test are called multi-cancer detection (MCD) assays or multi-cancer early detection (MCED) assays. These concepts are addressed in the next section.

## Multi-Cancer Detection

Cancer is rare when considering all cancers collectively and not just those that have existing screening tests with sufficient evidence of benefit. People having a multi-cancer detection (MCD) screening test may not have detectable disease at the time of screening and, therefore, will not benefit from early detection by these assays. Performance characteristics of MCD assays, along with the resulting cascade of care, are not fully understood, and therefore, the opportunity for harms is much greater with these MCD assays within the framework of what we know about cancer screening.

No MCD assay has been properly evaluated to show a mortality reduction in randomized clinical trials. Indeed, no such trials have been published. No MCD assay has been authorized by the U.S. Food and Drug Administration. However, some MCD assays are being marketed as laboratory developed tests (LDTs). These are assays that are designed, manufactured, and used within a single laboratory. Marketing is allowed under federal regulations, known as Clinical Laboratory Improvement Amendments (CLIA). Customers may be persuaded by the concept that earlier detection is good. It may be good, but there are also negative aspects. Potential negative aspects include overdiagnosis and false positives. For example, a test that detects cancer and indicates that it is most likely to be lung cancer is correct in a sense if the patient has cancer. But it is regarded to be a false positive unless the patient has lung cancer. These negative aspects may be more concerning and more complicated with MCD assays than with screening tests for specific tumor types. The benefits and harms of MCD assays are impossible to determine in the absence of randomized clinical trials that have mortality as an end point.

## High-Risk Populations

Cancer risk increases with advancing age, but some individuals have higher cancer risk, including the following:[1]

- Those with a personal or a strong family history of cancer, or those with inherited genetic mutations and polymorphisms associated with specific cancers.
- Those who have been exposed to environmental or occupational carcinogens (asbestos, uranium miners).
- Personal behaviors related to cancer risk (smoking, alcohol consumption, sun exposure).
- Those who have been exposed to therapeutic radiation (especially if it occurred during childhood or adolescence).

In general, the balance of benefits to harms is more favorable in higher risk individuals since they have a greater probability of benefiting from the screening while typically having a similar likelihood of experiencing the harms. Recommendations for screening, including the age to start and in some cases whether to screen at all, may differ by risk group. For example, lung cancer screening is recommended only for those with a substantial smoking history, and colorectal cancer screening is recommended to start at an earlier age for those with a family history of the disease.

### References

van Es N, Le Gal G, Otten HM, et al.: Screening for Occult Cancer in Patients With Unprovoked Venous Thromboembolism: A Systematic Review and Meta-analysis of Individual Patient Data. Ann Intern Med 167 (6): 410-417, 2017.28828492

## Cancer Recurrence

For more information about the recurrence of specific types of cancer, see the PDQ summaries on Adult Treatment (https://www.cancer.gov/publications/pdq/information-summaries/adult-treatment).

## Cancer Stage as Predictor

For nearly all cancers, treatment options and survival are related to stage, characterized by the anatomical extent of disease, as defined by tumor size, invasion of lymph nodes, and distant metastases. It is assumed that detection of cancer at an earlier stage yields better outcomes.

However, the biologic cellular characteristics of cancer, such as grade, hormone sensitivity, and gene overexpression are also recognized as important predictors of cancer behavior. For example, high-grade cancer may be fast growing and quick to metastasize regardless of stage at the time of diagnosis. Therefore, detection of these cancers when they are small may not improve outcome. Randomized controlled trials are most definitive in determining screening benefits.

## Interpreting Changes in Survival Over Time

Improvements in cancer survival over time are difficult to interpret, even when based on data from tumor registries, such as the Surveillance, Epidemiology, and End Results (SEER) Program that include all cases in a given population. They may reflect the benefits of early detection or improved treatment or both, but they may also result from lead-time bias and overdiagnosis, both of which occur commonly with screening.

Lead-time bias results in longer estimated survival of people with screen-identified cancers because the survival calculation includes the time preceding what would have been the clinical diagnosis of the cancer in the absence of screening.

Overdiagnosis results from finding cancers that would never have become manifest clinically. By definition, these tumors have 100% cancer-specific survival. For example, autopsy series of older men show a high percentage of occult early prostate carcinomas.[1] The increased discovery of these cancers through screening, or as incidental findings of tests performed for other purposes (e.g., computed tomography scans), increases the number of cases, gives the appearance of a stage shift, and results in improved survival and/or cure rates, without affecting cause-specific mortality in the population. Examples of cancers with increased incidence, in recent decades, caused primarily by a rise in incidentally detected cases include renal and thyroid cancers.[2] An analysis of data reported by the SEER Program between 1950 and 1996 for 20 major cancers found little correlation between changes in 5-year survival rates and changes in mortality rates.[3] Thus, improvements in 5-year survival rates are largely due to earlier diagnosis and to overdiagnosis. Reductions in incidence rates for late-stage tumors represent a better measure of decreased cancer mortality due to screening than do 5-year survival trends.

Relative survival compares the observed all-cause survival of a cohort of cancer patients with the expected all-cause survival of a comparable (age-, sex-, and race-matched) population. The relative survival rates of patients with early-stage cancer may be inflated artifactually by a screening test because people who choose to be screened are often more health conscious than the general population, engaging in a range of healthy lifestyle behaviors in addition to screening. For example, a report of SEER data showed a 10-year relative survival rate of more than 100% in patients with early-stage prostate, thyroid, and breast cancers, and ductal carcinoma in situ and melanoma. These five tumors are frequently diagnosed by screening in the United States.[4] This phenomenon is sometimes termed healthy screenee bias.

### References

Woolf SH: Screening for prostate cancer with prostate-specific antigen. An examination of the evidence. N Engl J Med 333 (21): 1401-5, 1995.7477122 96043645
Glasziou PP, Jones MA, Pathirana T, et al.: Estimating the magnitude of cancer overdiagnosis in Australia. Med J Aust 212 (4): 163-168, 2020.31858624
Welch HG, Schwartz LM, Woloshin S: Are increasing 5-year survival rates evidence of success against cancer? JAMA 283 (22): 2975-8, 2000.10865276 20325678
Marcadis AR, Marti JL, Ehdaie B, et al.: Characterizing Relative and Disease-Specific Survival in Early-Stage Cancers. JAMA Intern Med 180 (3): 461-463, 2020.31816009

## Study Designs

Findings from studies employing various study designs are used to support a given summary. The strongest design is the randomized controlled trial, although it is impractical to conduct such a trial addressing every question in the field of screening. For each summary of evidence statement, the associated strength of study designs is listed. There are five study designs that are generally used in judging the evidence. In order of strength of design, the five levels are as follows:

1. Evidence obtained from randomized controlled trials.
2. Evidence obtained from nonrandomized controlled trials.
3. Evidence obtained from cohort or case-control studies.
4. Evidence obtained from ecological and descriptive studies (e.g., international patterns studies, time series).
5. Opinions of respected authorities based on clinical experience, descriptive studies, or reports of expert committees.

Experimental trials are designed to correct for or eliminate the following biases: selection, lead-time, length, and healthy volunteer. The highest level of evidence and greatest benefit would be mortality reduction in a randomized controlled trial. Such evidence is not available for many situations because of the sample size, expense, and duration required. Case-control and cohort studies provide indirect evidence for the effectiveness of screening, but they can be limited by selection bias and healthy volunteer bias. For example, individuals who undergo screening have been shown to have lower mortality from causes unrelated to that screening than do those who did not undergo screening, likely caused by better overall health behavior profiles. Thus, observed differences in survival or mortality by screening history could be caused by these other factors and not the actual screening.[1] New screening modalities may identify more cancers but must be evaluated to determine whether their adoption produces a decrease in cancer-specific mortality versus an increase in lead time bias and overdiagnosis. While randomized trials can answer this question, they may be cost-prohibitive and impractical.[2]

Ecological studies can demonstrate association between screening and improvement in cancer stage and survival, with the adoption of cervical cancer screening as an excellent example.[3] Ecological studies are also valuable to assess the benefits of breast cancer screening, beyond the information gathered in randomized controlled studies, which were conducted over relatively short durations and in an era preceding major developments in cancer treatment.

Descriptive uncontrolled studies on the basis of the experience of individual physicians, hospitals, and non–population-based registries may yield useful information. The performance characteristics of various detection tests, such as sensitivity, specificity, and PPVs are generally first reported in such descriptive studies. The first evidence that screening may be successful is an increase in the incidence of early cancers and a decreased incidence of late-stage metastatic cancers (stage shift); later, a reduction in deaths may occur. These descriptive studies do not establish efficacy because of the absence of an appropriate control group and because they do not address the question whether early initiation of treatment affects patient outcomes (for more information about the Japanese neuroblastoma screening program, see the Potential Benefits and Harms section).

The opinions of authorities may be useful, but may suffer the same weaknesses described earlier. For PDQ's position regarding clinical practice guidelines, see the Scientific Basis for Summary Development section.

### References

Pierre-Victor D, Pinsky PF: Association of Nonadherence to Cancer Screening Examinations With Mortality From Unrelated Causes: A Secondary Analysis of the PLCO Cancer Screening Trial. JAMA Intern Med 179 (2): 196-203, 2019.30592477
Irwig L, Houssami N, Armstrong B, et al.: Evaluating new screening tests for breast cancer. BMJ 332 (7543): 678-9, 2006.16565097
Hakama M, Miller AB, Day NE, eds.: Screening for cancer of the uterine cervix. International Agency for Research on Cancer, 1986.

## Simulation Models

Another approach to formulating data about cancer screening is modeling. Models can generate information about cancer screening in circumstances where empiric evidence does not exist. A number of probabilistic and computer simulation models have been developed to do the following:

- Analyze trends in cancer detection and compare these trends with those reported in national or regional databases.
- Investigate the cost-effectiveness of various screening strategies.
- Estimate overdiagnosis resulting from screening.

Simulation modeling from the National Cancer Institute's Cancer Intervention and Surveillance Modeling Network (CISNET) program is a major effort in this area. Models have been developed to investigate the impact of screening for various cancers, as per the following examples:

- Changes in prostate cancer treatment, improvements in disease management after primary therapy, and screening are all factors in the observed decline in prostate cancer mortality.[1]
- The benefits and harms of eight breast cancer screening strategies are described, including age differences at the start of screening (40, 45, or 50 years) and screening intervals (annual, biennial, or hybrid).[2]
- The benefits and harms of computed tomography lung cancer screening are examined, comparing 576 different scenarios with varying eligibility criteria (age, pack-years of smoking, years since quitting), screening intervals (1, 2, or 3 years), and the ages of starting (45, 50, 55, or 60 years) and stopping (75, 80, or 85 years) screening.[3]

However, caution is necessary in interpreting model findings. Models are only as good as the assumptions upon which they are based, particularly those assumptions about the natural history of the target disease. Many models are complex, especially regarding the interaction of components and the generation of results, and multiple modeling efforts applied to the same screening scenario often give a wide range of quantitative results. In addition, models often produce results that are extrapolations beyond the range of the data input to the models.

### References

Etzioni R, Gulati R, Tsodikov A, et al.: The prostate cancer conundrum revisited: treatment changes and prostate cancer mortality declines. Cancer 118 (23): 5955-63, 2012.22605665
Mandelblatt JS, Stout NK, Schechter CB, et al.: Collaborative Modeling of the Benefits and Harms Associated With Different U.S. Breast Cancer Screening Strategies. Ann Intern Med 164 (4): 215-25, 2016.26756606
de Koning HJ, Meza R, Plevritis SK, et al.: Benefits and harms of computed tomography lung cancer screening strategies: a comparative modeling study for the U.S. Preventive Services Task Force. Ann Intern Med 160 (5): 311-20, 2014.24379002

## Informed and Shared Medical Decision Making

Guidelines for cancer screening increasingly mention the importance of individuals making informed decisions about participating in screening and sharing in decision making. Unbiased and balanced information about the potential benefits and harms of cancer prevention, screening, and treatment plays an important role in the informed decision-making process by the patient.

In a nationwide survey of informed decision-making during patient-provider discussions about colorectal, breast, and prostate cancer screening, patients considered themselves informed but often were not knowledgeable about the risks and benefits of screening. Patients reported that they were usually not asked about their preferences for cancer screening. Although more than 90% of the discussions addressed the advantages of screening, 30% or fewer addressed the disadvantages of screening.[1]

For many cancer screening decisions, shared decision-making is suggested, whereby the provider helps the patient make an informed, values-based choice from among two or more medically reasonable alternatives.[2,3] This is especially important when screening presents potential harms and limited benefits. There are three components of shared decision-making:[4]

1. The provider shares screening options with evidence-based information about benefits, harms, and uncertainties.
2. The patient shares preferences with the provider, who helps the patient evaluate these options and preferences and make a decision.
3. The provider assists with recording and implementing the patient’s preferences.

Patient decision aids can be useful, as they encourage patients to interpret evidence in the context of their own goals and concerns and to make decisions with their physicians. Decision aids are available in leaflets, booklets, videos, and websites, and they may include patient stories. The International Patient Decision Aid Standards (IPDAS) Collaboration has developed a method for evaluating the quality of decision aids.[5]

A Cochrane review of 115 randomized controlled trials of shared decision-making supported by decision aids indicated that, in general, decision aids improve patient knowledge about options and risks; reduce decisional conflict related to feeling uninformed or unclear about personal values; and stimulate patients to take more active roles in decision-making. In some cases, decision aids have also been noted to reduce the number of patients choosing major elective invasive surgery over more conservative options, and in fewer patients choosing cancer screening. The effect of using decision aids may lengthen or shorten the duration of the consultation.[6]

After using a decision aid that included information about breast cancer overdetection, more women met the threshold for adequate overall knowledge about screening benefits and risks. Women whose decision aids included information about overdetection were less enthusiastic about screening and were less likely to participate.[7]

### References

Hoffman RM, Lewis CL, Pignone MP, et al.: Decision-making processes for breast, colorectal, and prostate cancer screening: the DECISIONS survey. Med Decis Making 30 (5 Suppl): 53S-64S, 2010 Sep-Oct.20881154
O'Connor AM, Llewellyn-Thomas HA, Flood AB: Modifying unwarranted variations in health care: shared decision making using patient decision aids. Health Aff (Millwood) Suppl (Variation): VAR63-72, 2004.15471770
Charles C, Gafni A, Whelan T: Shared decision-making in the medical encounter: what does it mean? (or it takes at least two to tango). Soc Sci Med 44 (5): 681-92, 1997.9032835
Coulter A, Collins A: Making Shared Decision-Making a Reality: No Decision About Me, Without Me. The King's Fund, 2011. Also available online (https://www.kingsfund.org.uk/sites/files/kf/Making-shared-decision-making-a-reality-paper-Angela-Coulter-Alf-Collins-July-2011_0.pdf). Last accessed August 17, 2023.
Elwyn G, O'Connor A, Stacey D, et al.: Developing a quality criteria framework for patient decision aids: online international Delphi consensus process. BMJ 333 (7565): 417, 2006.16908462
Stacey D, Hawker G, Dervin G, et al.: Decision aid for patients considering total knee arthroplasty with preference report for surgeons: a pilot randomized controlled trial. BMC Musculoskelet Disord 15: 54, 2014.24564877
Hersch J, Barratt A, Jansen J, et al.: Use of a decision aid including information on overdetection to support informed choice about breast cancer screening: a randomised controlled trial. Lancet 385 (9978): 1642-52, 2015.25701273

## Disease-Specific Versus All-Cause Mortality End Points

Disease-specific mortality, the most widely accepted end point in randomized clinical trials of cancer screening, assumes that the cause of death can be accurately determined and that the screening and subsequent treatments have negligible effects on other causes of death. By contrast, all-cause mortality depends only on the date and accurate ascertainment of death. Because cancer deaths generally comprise only a small fraction of all deaths in a screening trial, the statistical power to detect a significant reduction in all-cause mortality in any single trial, or even in some meta-analyses, is typically low. Nevertheless, all-cause mortality should be considered in conjunction with disease-specific mortality to reduce the possibility that a major effect from screening is hidden by misclassification in cause of death. The National Lung Screening Trial of low-dose computed tomography lung cancer screening did demonstrate a significant reduction in all-cause mortality and a meta-analysis of flexible sigmoidoscopy trials also showed a significant all-cause mortality benefit.[1,2] In contrast, meta-analyses of mammography screening trials have failed to demonstrate a significant reduction in all-cause mortality.[3]

### References

Aberle DR, Adams AM, Berg CD, et al.: Reduced lung-cancer mortality with low-dose computed tomographic screening. N Engl J Med 365 (5): 395-409, 2011.21714641
Tinmouth J, Vella ET, Baxter NN, et al.: Colorectal Cancer Screening in Average Risk Populations: Evidence Summary. Can J Gastroenterol Hepatol 2016: 2878149, 2016.27597935
Nelson HD, Fu R, Cantor A, et al.: Effectiveness of Breast Cancer Screening: Systematic Review and Meta-analysis to Update the 2009 U.S. Preventive Services Task Force Recommendation. Ann Intern Med 164 (4): 244-55, 2016.26756588

## Measures of Risk

Several measures of risk are used in cancer research. Absolute risk or absolute rate measures the actual cancer risk or rate in a population or subgroup (e.g., U.S. population, or White or Black individuals). For example, the Surveillance, Epidemiology, and End Results (SEER) Program reports risk and rate of cancer in specific geographic areas of the United States.

Rates are often adjusted (e.g., age-adjusted rates) to allow a more accurate comparison of rates over time or among groups. The purpose of the adjustment is to make the groups more alike with respect to important characteristics that may affect the conclusions. For example, when the SEER Program compares cancer rates over time in the United States, the rates are adjusted to one age distribution because cancer rates are usually higher in older age groups.

Relative risk (RR) compares the risk of developing cancer among those who have a particular characteristic or exposure with those who do not. RR is expressed as a ratio of risks or rates. If the RR is one, the risk of both groups is the same; if the RR is greater than one, the exposure or characteristic is associated with a higher cancer risk; if the RR is less than one, it is associated with a lower cancer risk. RR is often used in clinical trials of cancer prevention and screening to estimate the reduction in cancer risk or risk of death, respectively.

An odds ratio (OR) is often used as an estimate of the RR. It, too, indicates whether there is an association between an exposure or characteristic and cancer. It compares the odds of an exposure or characteristic among cancer cases with the odds among a comparison group without cancer.

Uncertainty in an estimated OR (or RR) is sometimes presented as a confidence interval (CI), which represents the range of values for the OR (or RR) that is plausible based on the observed study data. If the CI range contains 1, it indicates that the observed data would not be unusual if the two groups truly do not differ in their odds (or risk) of experiencing the event.

Risk or rate difference (or excess risk) compares the actual cancer risk or rate among at least two groups of people, based on an important characteristic or exposure, by subtracting the risks or rates from one another (e.g., subtracting lung cancer rates among nonsmokers from that of cigarette smokers estimates the excess risk of lung cancer due to smoking). This can be used in public health to estimate the number of cancer cases that could be avoided if an exposure were reduced or eliminated in the population.

Population-attributable risk measures the proportion of cancers that can be attributed to a particular exposure or characteristic. It combines information about the RR of cancer associated with a particular exposure and the prevalence of that exposure in the population, and estimates the proportion of cancer cases in a population that could be avoided if an exposure were reduced or eliminated.

The number needed to screen (NNS) is a metric of screening efficiency defined as the number of people that must participate in a screening program for one death to be prevented over a defined time interval. NNS estimates are typically derived from screening trial data. For screening modalities that can prevent cancer, as well as detect it earlier, such as endoscopic screening for colorectal cancer, an NNS to prevent one incident cancer is also a useful metric.

Average life-years saved estimates the number of years of life that an intervention saves, on average, for an individual who receives the intervention. This reflects mortality reduction and life extension (or avoidance of premature deaths).

## The Impact of Screen Detection on Measures of Risk

When overdiagnosis occurs with screening, absolute and relative measures of risk calculated from studies with participants whose disease was screen-detected must be carefully interpreted. If the chance of diagnosis as a result of screening (either due to screening itself or diagnostic workup of a positive screen) is positively correlated with a given factor, risk measures will be inflated relative to those calculated from unscreened populations. The degree of inflation depends on prevalence of screening and the degree of correlation. As screening is adopted in population settings, trend data for risk will be affected similarly.[1]

Many of the groundbreaking observational studies in cancer etiology were performed before cancer screening was widely adopted. Given the extensive uptake of screening for certain cancers, recently conducted observational etiologic studies include many participants whose disease was detected through screening. This may skew the results of these trials.

For example, assume that men with blue eyes are more likely to participate in prostate-specific antigen screening and more willing to undergo prostate biopsy. Despite the absence of a biologic association between blue eyes and prostate cancer, more cancers will be detected in blue-eyed men because they are screened. Since many prostate cancers can be safely left undiagnosed and untreated, many of these cancers in blue-eyed men represent overdiagnosis.

When overdiagnosis occurs due to screening, and when screening behavior or willingness to seek diagnostic evaluation is correlated with risk factors, relative risk measures generated from these studies may be over-stated and results may be misleading.

### References

Tangen CM, Goodman PJ, Till C, et al.: Biases in Recommendations for and Acceptance of Prostate Biopsy Significantly Affect Assessment of Prostate Cancer Risk Factors: Results From Two Large Randomized Clinical Trials. J Clin Oncol 34 (36): 4338-4344, 2016.27998216

## Latest Updates to This Summary (10/16/2023)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Cancer Screening Overview. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/screening/hp-screening-overview-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389235]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).